# Financial Toxicity and Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of colon cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Financial Toxicity Associated With Cancer Care—Background and Prevalence

### Introduction

A number of studies demonstrate that individuals with cancer are at higher risk of experiencing financial difficulty than are individuals without cancer.[1-7] This summary reviews the extant literature on financial toxicity among American cancer patients and survivors.

### Background

Cancer is one of the most costly medical conditions to treat in the United States.[8] Patients can receive multiple types of treatment, including surgery, radiation therapy, and systemic treatment. Historically, inpatient hospitalizations have been the major drivers of the costs of cancer care. Compared to a decade ago, patients with cancer are receiving increasingly expensive chemotherapy and biologics, both alone and in combination.[9,10] The use of expensive supportive agents and hematopoietic growth factors has also increased.[9] The list price of newly introduced systemic therapies and supportive drug-based treatments is growing,[9-11] and prices of both infusion and oral drugs continue to increase after product launch.[12,13] Although prices can vary dramatically among treatments, often data are lacking about the differences in outcomes. Prices higher than $10,000 a month for individual drugs and biologic agents are common.

At the same time, commercial insurers in the United States are shifting more direct medical care costs to patients through higher premiums, deductibles, and coinsurance and copayment rates. The 2016 Commonwealth Fund Biennial Health Insurance Survey indicated that 33% of insured adults aged 19 to 64 years had medical bill problems or accrued medical debt.[14] Infused chemotherapy and supportive agents covered under patients’ medical benefits entail high out-of-pocket costs; these costs also appear to be growing as care shifts from the community into hospital-based outpatient departments.

Oral cancer drug–based treatments are frequently covered under patient pharmacy benefits’ specialty tier, requiring high coinsurance that patients pay out of pocket. High cost-sharing plans, including tiered outpatient prescription formularies (i.e., copays that escalate depending on whether the drug is generic or branded, and by price) may be particularly troublesome for patients with cancer who are prescribed expensive oral chemotherapeutics. The proportion of health care plans with multitiered (>3) prescription formularies, in which expensive oral specialty drugs are associated with the highest cost sharing, increased from 3% in 2004 to nearly 88% in 2017.[15] These trends in treatment cost and changes in insurance coverage suggest that financial distress associated with acute and chronic cancer is highly prevalent, even among people with health insurance.

Compared with individuals without a cancer history, cancer survivors have higher out-of-pocket costs, even many years after initial diagnosis,[1-4] reflecting ongoing cancer care and care for any late or lasting treatment effects. In addition, cancer survivors are more likely to report being unable to work because of their health,[1-4] including more missed work days or additional days spent in bed because of poor health.[1-4] Limited ability to work may also reduce employment-based health insurance options and resources to pay for medical care, further magnifying the financial impact of cancer. Combined, these factors contribute to financial toxicity—the phenomenon of adverse financial effects of cancer treatment.

A number of other terms have been used to describe the financial impact of cancer, its treatment, and the lasting effects of treatment, including financial distress, financial stress, financial hardship, financial burden, economic burden, and economic hardship.[16,17]

### Etiology and Risk Factors

The interplay between cancer and financial distress is complex and related to a number of factors, as shown in Figure 1.[18,19]

Figure 1. Conceptual framework relating severe illness, treatment choice, and health and financial outcomes. Credit: Scott Ramsey, MD, PhD.

Flow chart showing the conceptual framework relating severe illness, treatment choice, and health and financial outcomes.

Several factors in a household at the time a member of that household is diagnosed with cancer influence vulnerability to financial distress. The risk of severe financial distress and the period between illness and these outcomes are influenced by the following factors:

- Wage-earner status of the affected household member (primary, secondary, etc.).
- Pre-illness debt load.
- Assets.
- Illness-associated costs.
- The influence of the illness and its treatment on ability to work.
- The presence and terms of the health and disability insurance of the patient.
- Incomes of others in the household.

At the time of cancer diagnosis, several factors that determine the long-range risk of financial hardship include the following:

- The general health and noncancer comorbidities of the patient.
- Assets.
- Existing debt.
- Household income.
- A household with income from other sources, such as a spouse or family member who works outside the home.

Components of these measures include material conditions that arise from increased out-of-pocket expenses, lower income from the inability to work, and psychological response to increased household expenses and reduced income.[16,17]

The material conditions of patients and their families that may be adversely affected by a cancer diagnosis and treatment are typically measured as follows:[16,17]

- Out-of-pocket medical costs.
- Out-of-pocket costs as a percentage of income.
- Reduction in income and assets.
- Medical debt.
- Trouble paying medical bills and for necessities (e.g., housing, food).
- Bankruptcy.

In addition, a patient's psychological response to increased financial burden associated with a cancer diagnosis and treatment is typically measured as financial stress, distress, or worry.[16,17]

### Prevalence

A number of studies have measured components of at least one aspect of financial hardship,[1,4-6,20-32] although methods and measures vary widely, limiting comparisons across studies. In addition, most studies that have evaluated financial hardship were conducted at single institutions, which are geographically defined, or in other selected samples of cancer survivors. Nationally representative estimates of financial hardship from survey data are generally reported for all cancer survivors, and scant information is available by cancer site or stage of disease at diagnosis. Household surveys generally include few newly diagnosed cancer patients, those with rare cancers, or those with projected short-term survival. Because data about financial hardship are not routinely collected and can be difficult to measure, few studies have reported incidence of financial hardship among the newly diagnosed or newly treated.

The following sections describe the prevalence of specific measures of financial hardship, including out-of-pocket costs, productivity loss, asset depletion and medical debt, bankruptcy, and financial distress and worry.

#### Prevalence of high out-of-pocket costs

Out-of-pocket costs, one of the most common measures of financial hardship, are the amounts that patients pay directly for their medical care. They include insurance copayments, coinsurance, and deductibles for prescription and nonprescription medications, hospitalizations, outpatient services, and other types of medical care.[17] Cancer survivors generally report higher out-of-pocket expenditures than individuals without a cancer history.[1-3,7,20] In a nationally representative sample, recently diagnosed cancer survivors aged 18 to 64 years reported $1,107 in annual out-of-pocket spending, compared with $747 for previously diagnosed cancer survivors and $617 for those without a cancer history (all in 2010 dollars).[2]

In a study of long-term breast cancer survivors, 18% paid between $2,001 and $5,000 in out-of-pocket expenses, and 17% paid more than $5,000.[24] Cancer survivors are also more likely to report a high out-of-pocket burden (i.e., annual out-of-pocket health care spending >20% of annual income) than individuals without a cancer history,[4-6] although estimates vary widely, reflecting differences in population characteristics.

In a study conducted using the nationally representative Medical Expenditure Panel Survey (MEPS), 4.3% of cancer survivors aged 18 to 64 years reported a high out-of-pocket burden, compared with 3.4% of those without a cancer history.[4] In a study using the nationally representative Medicare Current Beneficiary Survey, 28% of cancer survivors reported a high out-of-pocket burden, compared with 16% of those without a cancer history.[6] Approximately 84% of the Medicare beneficiaries were aged 65 years and older.

#### Prevalence of productivity loss

Productivity loss is typically measured as the inability to work or pursue usual activities, days lost from work or disability days, reduction in work hours, and days spent in bed. Productivity loss may be quantified directly from employment data [22,31] or estimated with median wages.[1-3] Several studies have used data from the nationally representative MEPS. Using data from the Panel Study of Income Dynamics, a nationally representative, prospective, population-based observational study, one study found that the probability of being employed among people reporting a cancer diagnosis decreased 9 percentage points 3 years from the date of diagnosis, with no recovery for those alive in years 4 and 5. During this time, survivors’ labor market earnings dropped by up to 40%. Family income dropped by 20% during this time but recovered by year 4.[33] Another analysis reported that, among the employed, those receiving cancer care missed 22.3 more workdays per year than individuals without any cancer treatment.[34] An estimated productivity loss for adult survivors of adolescent and young adult cancers was $4,564 compared with $2,314 for adults without a cancer history (in 2011 dollars).[3] Employed cancer survivors reported that cancer interfered with physical tasks (25%) and mental tasks (14%) required by their jobs.[1]

#### Prevalence of asset depletion and medical debt

Several studies have reported the prevalence of asset depletion and medical debt for cancer survivors, although this information is rarely reported in relation to individuals without a cancer history or before and after a cancer diagnosis. Further, most estimates are based on self-report, and little validation work has been conducted.

Studies of cancer survivors suggest that between 33% and 80% of the survivors have used savings to finance medical expenses,[20,24,28,30,32] and between 2% and 34% have borrowed money to pay for their care or have medical debt.[21,24-26,28] In a study of women with breast cancer, self-reported debt varied by race and ethnicity, with 58.9% of Black, 33.5% of Latina, 28.8% of Asian, and 27.1% of White women reporting treatment-related debt.[35] In a study of colon cancer survivors in Washington state, the mean debt among the survivors with debt was $26,860 (in 2009 dollars).[28] To cope with expenses, cancer survivors have reported decreasing spending on leisure activities, food, clothing, and utilities; selling stocks, investments, possessions, or property; and changing housing.[24,28,30,32,34,35]

#### Incidence and prevalence of bankruptcy

One of the few studies to measure the incidence of financial hardship reported that 1.7% of cancer survivors filed for bankruptcy in the 5 years after diagnosis.[27] Cancer survivors were 2.7 times more likely to file for bankruptcy than individuals without a cancer history.[27] Other studies have reported a prevalence of bankruptcy ranging from 1.2% to 3% among cancer survivors.[20,21,26,36]

#### Prevalence of financial stress, distress, or worry

Several studies have found a prevalence of financial stress and worry about paying medical bills for cancer ranging from 22.5% in a nationally representative sample [21] to 64% in a sample of working-age cancer survivors.[21,23] About 45% of cancer survivors recruited from a single outpatient oncology clinic study reported wage concerns.[23] In one study, respondents reported being at least somewhat worried about finances as a result of breast cancer or its treatment, with 49.7% of Latina, 48.9% of Black, 35.2% of Asian, and 31.9% of White women reporting at least some worry.[35] Patients and their families may also experience difficulty and stress in interpreting complex medical bills, although this stress is less studied.

#### Prevalence of financial hardship as a composite measure

Several studies combine multiple components of financial hardship using summary measures, scores, or measures, including the Comprehensive Score for Financial Toxicity (COST) measure and the Personal Financial Wellness (PFW) Scale (formerly known as the InCharge Financial Distress/Financial Well-Being [IFDFW] Scale), but the results are rarely presented in relation to the general population and can be difficult to interpret.

In a study of patients with multiple myeloma undergoing treatment at a single academic cancer center, cancer survivors had a mean COST score of 23 (range, 0–44, with lower values equivalent to higher burden).[37] Another study used the IFDFW Scale in a convenience sample of cancer patients receiving radiation therapy or chemotherapy at a single outpatient cancer center and found an average financial distress score of 5 [17] (range, 1–10, with lower numbers indicating higher distress).[25] In other studies, financial burden scores were based on the count of affirmative responses to a series of questions,[26,30,34] and the mean number (e.g., 2.94 economic burden items related to work and hardship events) was calculated.[26]

### References

Ekwueme DU, Yabroff KR, Guy GP, et al.: Medical costs and productivity losses of cancer survivors--United States, 2008-2011. MMWR Morb Mortal Wkly Rep 63 (23): 505-10, 2014.24918485
Guy GP, Ekwueme DU, Yabroff KR, et al.: Economic burden of cancer survivorship among adults in the United States. J Clin Oncol 31 (30): 3749-57, 2013.24043731
Guy GP, Yabroff KR, Ekwueme DU, et al.: Estimating the health and economic burden of cancer among those diagnosed as adolescents and young adults. Health Aff (Millwood) 33 (6): 1024-31, 2014.24889952
Guy GP, Yabroff KR, Ekwueme DU, et al.: Healthcare Expenditure Burden Among Non-elderly Cancer Survivors, 2008-2012. Am J Prev Med 49 (6 Suppl 5): S489-97, 2015.26590644
Bernard DS, Farr SL, Fang Z: National estimates of out-of-pocket health care expenditure burdens among nonelderly adults with cancer: 2001 to 2008. J Clin Oncol 29 (20): 2821-6, 2011.21632508
Davidoff AJ, Erten M, Shaffer T, et al.: Out-of-pocket health care expenditure burden for Medicare beneficiaries with cancer. Cancer 119 (6): 1257-65, 2013.23225522
Langa KM, Fendrick AM, Chernew ME, et al.: Out-of-pocket health-care expenditures among older Americans with cancer. Value Health 7 (2): 186-94, 2004 Mar-Apr.15164808
Soni A: Trends in the Five Most Costly Conditions among the U.S. Civilian Institutionalized Population, 2002 and 2012. Statistical Brief 470. Rockville, Md: Agency for Healthcare Research and Quality, 2015. Available online (https://meps.ahrq.gov/data_files/publications/st470/stat470.shtml). Last accessed May 28, 2024.
Bradley CJ, Yabroff KR, Warren JL, et al.: Trends in the Treatment of Metastatic Colon and Rectal Cancer in Elderly Patients. Med Care 54 (5): 490-7, 2016.26900834
Shih YC, Smieliauskas F, Geynisman DM, et al.: Trends in the Cost and Use of Targeted Cancer Therapies for the Privately Insured Nonelderly: 2001 to 2011. J Clin Oncol 33 (19): 2190-6, 2015.25987701
Conti RM, Fein AJ, Bhatta SS: National trends in spending on and use of oral oncologics, first quarter 2006 through third quarter 2011. Health Aff (Millwood) 33 (10): 1721-7, 2014.25288415
Gordon N, Stemmer SM, Greenberg D, et al.: Trajectories of Injectable Cancer Drug Costs After Launch in the United States. J Clin Oncol 36 (4): 319-325, 2018.29016226
Shih YT, Xu Y, Liu L, et al.: Rising Prices of Targeted Oral Anticancer Medications and Associated Financial Burden on Medicare Beneficiaries. J Clin Oncol 35 (22): 2482-2489, 2017.28471711
2016 Biennial Health Insurance Survey. New York, NY: The Commonwealth Fund, 2017. Available online. (https://www.commonwealthfund.org/publications/surveys/2017/feb/2016-biennial-health-insurance-survey)Last accessed May 28, 2024.
2017 Employer Health Benefits Survey. San Francisco, Calif: Henry J. Kaiser Family Foundation, 2017. Available online. (https://www.kff.org/health-costs/report/2017-employer-health-benefits-survey/)Last accessed May 28, 2024.
Tucker-Seeley RD, Yabroff KR: Minimizing the "financial toxicity" associated with cancer care: advancing the research agenda. J Natl Cancer Inst 108 (5): , 2016.26657336
de Souza JA, Yap B, Ratain MJ, et al.: User beware: we need more science and less art when measuring financial toxicity in oncology. J Clin Oncol 33 (12): 1414-5, 2015.25732158
Smith R, Clarke L, Berry K, et al.: A comparison of methods for linking health insurance claims with clinical records from a large cancer registry. [Abstract] Med Decis Making 21 (6): 530, 2001.
Fay S, Hurst E, White MJ: The household bankruptcy decision. Am Econ Rev 92 (3): 706-18, 2002.
Banegas MP, Guy GP, de Moor JS, et al.: For Working-Age Cancer Survivors, Medical Debt And Bankruptcy Create Financial Hardships. Health Aff (Millwood) 35 (1): 54-61, 2016.26733701
Yabroff KR, Dowling EC, Guy GP, et al.: Financial Hardship Associated With Cancer in the United States: Findings From a Population-Based Sample of Adult Cancer Survivors. J Clin Oncol 34 (3): 259-67, 2016.26644532
Chang S, Long SR, Kutikova L, et al.: Estimating the cost of cancer: results on the basis of claims data analyses for cancer patients diagnosed with seven types of cancer during 1999 to 2000. J Clin Oncol 22 (17): 3524-30, 2004.15337801
Ell K, Xie B, Wells A, et al.: Economic stress among low-income women with cancer: effects on quality of life. Cancer 112 (3): 616-25, 2008.18085642
Jagsi R, Pottow JA, Griffith KA, et al.: Long-term financial burden of breast cancer: experiences of a diverse cohort of survivors identified through population-based registries. J Clin Oncol 32 (12): 1269-76, 2014.24663041
Meisenberg BR, Varner A, Ellis E, et al.: Patient Attitudes Regarding the Cost of Illness in Cancer Care. Oncologist 20 (10): 1199-204, 2015.26330457
Meneses K, Azuero A, Hassey L, et al.: Does economic burden influence quality of life in breast cancer survivors? Gynecol Oncol 124 (3): 437-43, 2012.22138013
Ramsey S, Blough D, Kirchhoff A, et al.: Washington State cancer patients found to be at greater risk for bankruptcy than people without a cancer diagnosis. Health Aff (Millwood) 32 (6): 1143-52, 2013.23676531
Shankaran V, Jolly S, Blough D, et al.: Risk factors for financial hardship in patients receiving adjuvant chemotherapy for colon cancer: a population-based exploratory analysis. J Clin Oncol 30 (14): 1608-14, 2012.22412136
Regenbogen SE, Veenstra CM, Hawley ST, et al.: The personal financial burden of complications after colorectal cancer surgery. Cancer 120 (19): 3074-81, 2014.24889014
Veenstra CM, Regenbogen SE, Hawley ST, et al.: A composite measure of personal financial burden among patients with stage III colorectal cancer. Med Care 52 (11): 957-62, 2014.25304021
Wan Y, Gao X, Mehta S, et al.: Indirect costs associated with metastatic breast cancer. J Med Econ 16 (10): 1169-78, 2013.23866016
Zafar SY, Peppercorn JM, Schrag D, et al.: The financial toxicity of cancer treatment: a pilot study assessing out-of-pocket expenses and the insured cancer patient's experience. Oncologist 18 (4): 381-90, 2013.23442307
Zajacova A, Dowd JB, Schoeni RF, et al.: Employment and income losses among cancer survivors: Estimates from a national longitudinal survey of American families. Cancer 121 (24): 4425-32, 2015.26501494
Finkelstein EA, Tangka FK, Trogdon JG, et al.: The personal financial burden of cancer for the working-aged population. Am J Manag Care 15 (11): 801-6, 2009.19895184
Jagsi R, Ward KC, Abrahamse PH, et al.: Unmet need for clinician engagement regarding financial toxicity after diagnosis of breast cancer. Cancer 124 (18): 3668-3676, 2018.30033631
Meisenberg BR: The financial burden of cancer patients: time to stop averting our eyes. Support Care Cancer 23 (5): 1201-3, 2015.25711655
Huntington SF, Weiss BM, Vogl DT, et al.: Financial toxicity in insured patients with multiple myeloma: a cross-sectional pilot study. Lancet Haematol 2 (10): e408-16, 2015.26686042

## Risk Factors Associated With Financial Toxicity

Several disease-related, sociodemographic, and health insurance–related factors have been implicated as contributors to increased risk of financial toxicity among cancer patients and survivors.

### Disease- and Treatment-Related Risk Factors

Patients with advanced-stage cancers, cancers requiring chemotherapy or radiation therapy, and underlying comorbidities have a higher risk of financial hardship after diagnosis than those without these characteristics.[1-4] In a study of 1,556 cancer survivors identified from the 2010 National Health Interview Survey (NHIS) who responded to a single survey item assessing financial burden, survivors were more likely to report high financial burden if they received chemotherapy (47.2% vs. 30.8%; P < .001), received radiation therapy (44.7% vs. 31.4%; P < .001), and had recurrent or multiple cancers (40.9% vs. 33.7%; P < .049).[3]

A similar association was seen in an analysis using data from the 2008–2010 Medical Expenditures Panel Survey (MEPS) Household Component to measure loss of employment and productivity in individuals with and without cancer.[1] In this study, survivors with more-aggressive disease processes (i.e., recurrent, multiple, or poor-prognosis cancers) had the highest rates of lost productivity relative to individuals without cancer. Specifically, individuals with cancers associated with short survival were less likely to be employed (66.8% vs. 81.4%; P < .0001) and more likely to face limitations on their ability to participate in activities at home, work, or school (17.5% vs. 8.5%; P < .001) than individuals without cancer. Productivity among survivors of breast, prostate, colorectal, and other single cancers was not as decreased as productivity among those with higher-risk disease.

Another study used multiple years of the MEPS (2008‒2013) to evaluate the associations between cancer history, chronic conditions, and productivity losses.[5] Adult cancer survivors were significantly more likely to have chronic conditions, including heart disease, diabetes, asthma, and arthritis, than were adults without a cancer history. They were also more likely to have multiple chronic conditions. Cancer survivors who had multiple chronic conditions were more likely to be limited in their ability to work than cancer survivors without these other conditions. Among cancer survivors, those with four or more chronic conditions had annual productivity loss of $9,099 (95% confidence interval [CI], $7,224‒$10,973) compared with those without any additional chronic conditions (in 2013 dollars).

Receipt of cancer-directed treatment and the presence of other comorbidities were also found to be associated with higher out-of-pocket spending in the Medicare population. In a study using data from the Medicare Current Beneficiary Survey linked to Medicare claims (1997–2007), 2-year mean out-of-pocket spending was higher by $1,526 among patients receiving chemotherapy and by $1,470 among patients receiving radiation therapy compared with patients who did not receive treatment (P < .01).[6]

These studies suggest that cancer survivors across a broad age range with advanced cancers, recurrent cancers, or cancers that require treatment (likely a marker of more-advanced disease) are more likely to face higher out-of-pocket spending and are at higher risk of financial hardship. Chronic treatment-related spending in combination with inability to regain employment and income resulting from progressive disease and debility may contribute to the association between advanced disease and greater financial burden.

### Sociodemographic Risk Factors

#### Age

A number of studies have consistently demonstrated an association between younger age at cancer diagnosis and higher risk of various types of financial hardship.[3,7-11] In the setting of a health shock such as cancer, younger individuals may be particularly vulnerable to financial hardships because of a lack of savings and assets, as well as competing financial obligations (e.g., children). Moreover, younger survivors lack the protection of Medicare coverage, placing some without insurance or with high-deductible health plans at risk of financial toxicity.

In a study of western Washington residents with and without cancer, bankruptcy rates were highest among both cancer survivors and noncancer controls aged 20 to 34 years (10.06 and 3.15 per 1,000 person-years, respectively) and lowest among survivors and controls aged 80 to 90 years (0.94 and 0.57 per 1,000 person-years, respectively).[7] More notably, the relative risk of bankruptcy filing for cancer survivors versus controls increased with each younger-age cohort. Other studies have similarly shown that younger individuals with cancer are at higher risk of financial hardship.[3,9]

In an analysis of data from the 1,202 adult cancer survivors identified from the 2011 MEPS Experiences with Cancer questionnaire, material financial hardship (defined as bankruptcy, loans, debt, inability to pay for care, or making other financial sacrifices) was more common among cancer survivors younger than 65 years compared with those aged 65 years and older (28.4% vs. 13.8%; P < .001).[10] In a study of 4,719 adult cancer survivors aged 18 to 64 years who completed the 2012 Livestrong survey, debt and bankruptcy were higher among survivors aged 45 to 54 years (risk ratio [RR], 1.66; P < .001) and aged 18 to 44 years (odds ratio [OR], 2.07; P < .001) compared with survivors aged 55 to 64 years.[8]

Accumulating evidence suggests that adult survivors of childhood cancers may be especially vulnerable to financial hardship.[11,12] A cancer diagnosis during childhood can interfere with physical, emotional, and mental development and disrupt education and limit employment opportunities. Childhood cancer survivors also face elevated risk of second cancers and other late and lasting effects of their treatment(s). Research from the Childhood Cancer Survivor Study found that adult survivors of childhood cancers were more likely to spend at least 10% of their annual incomes on out-of-pocket medical costs than their siblings (10.2% vs. 2.9%; P < .001).[12]

Financial hardship among younger patients, however, may not solely result from higher out-of-pocket spending for cancer care. In a study using data from the 2001–2008 MEPS, a higher proportion of individuals aged 55 to 64 years reported spending 20% or more of their incomes on health care and premiums relative to younger individuals aged 18 to 39 years (10.1% vs. 7.1%; P = .05). This discrepancy suggests that high out-of-pocket spending alone does not lead to financial hardship.

#### Income

As might be expected, cancer patients in lower-income household groups are also at increased risk of treatment-related financial hardship. No clear income threshold below which financial hardship risk markedly increases has been identified because annual household income has been categorized differently across studies. For example, in one study of cancer patients aged 18 to 64 years identified from the 2012 Livestrong survey, income between $41,000 and $80,000 and income of $40,000 or below were both associated with increased risk of borrowing money or going into debt compared with income of $81,000 and higher (OR, 2.46 and 3.52, respectively; P < .0001).

Other studies have shown increased risk of financial hardship among individuals with household incomes below $50,000 or $20,000.[9,13] However, there is currently no consensus about an absolute income below which patients face higher financial-hardship risk. In the Medicare population, this association also seems to hold true, with higher income (represented as percentages above the federal poverty level) being protective against high out-of-pocket cost burden.[6]

#### Race and ethnicity

Race and ethnicity are strongly associated with disparities in cancer health outcomes, including survival.[14,15] A number of studies have explored the experiences of racial and ethnic minority groups and financial hardship after a cancer diagnosis.[16-18]

In a study using data from 3,242 lung and colorectal cancer survivors participating in the Cancer Care Outcomes Research and Surveillance Consortium (CanCORS) study, African American race was associated with an increased risk of self-reported economic burden relative to White race among patients with colorectal cancer (OR, 1.69; 95% CI, 1.24–2.30) after researchers adjusted for other sociodemographic and clinical factors.[17] This association was not seen among Hispanic survivors with either lung or colorectal cancer or African American survivors with lung cancer.

In another population-based survey of 3,133 women with breast cancer, Spanish-speaking women were at greater risk of financial decline compared with White women (OR, 2.76; P = .006). English-speaking Latina and African American women did not share this increased risk.[16] In this same study, African American and English-speaking Latina women were also more likely to report at least one privation as a result of breast cancer (i.e., economically motivated nonadherence or broader hardships related to medical expenses) compared with White women (OR, 2.62; P < .001 and OR, 2.17; P < .017, respectively), but this association was not seen with Spanish-speaking women.

Both analyses were adjusted for key demographic variables, including income, age, marital status, and education, which might also influence risk of financial hardship. Strong associations between minority race and ethnicity and financial hardship have not been demonstrated in other studies. However, these findings suggest that further research among cancer survivors is warranted.

#### Employment

Loss of productivity and employment can be considered both a risk factor for (predictor of) financial toxicity and a measure of financial toxicity (outcome). Several studies have shown that cancer patients experience loss of work, difficulty in returning to work, declines in income, and general loss of productivity as a result of cancer diagnoses.[1,18-20] Although employment and productivity loss can themselves be considered poor financial outcomes, employment loss has also been shown to be a risk factor for other material hardships, including debt and bankruptcy, whereas retirement has been shown to be protective.[8,10]

In an analysis of data from 1,202 adult cancer survivors from the 2011 MEPS Experiences with Cancer questionnaire, change in employment after diagnosis (switching to part-time work and taking extended leave) was associated with a substantially increased risk of material financial hardship compared with no change (49.1% vs. 20.2%; P < .001).[10] Particularly for the younger working-age population, loss of employment may be a mediator in the pathway between cancer diagnosis and financial toxicity.

Compared with those without cancer, cancer survivors are more likely to report being unable to work, or being limited in the amount or type of work they can do, in both the short-term (1 year) and long-term (11+ years) postdiagnosis periods.[21-27] Estimates of nonemployment have typically shown that approximately 20% to 30% of people who worked before a cancer diagnosis did not return to work after a diagnosis.[28] People who earned a low income, were part of a racial or ethnic minority group, or had advanced-stage disease were less likely to return to work.[29] Several studies have shown that people who received chemotherapy were less likely to return to work. This may be because of the long-term side effects of therapy or a lack of accommodations by employers while the person was undergoing treatment.[27,30-33] People who underwent more extensive surgical procedures also were at risk of stopping work or declining employment.[34-36] For patients with cancer, including those treated in the palliative setting, work promotes a sense of normalcy and control during and after treatment and provides income and insurance benefits.[37,38]

### Health Insurance

Patients who lack health insurance coverage are at elevated risk of many adverse experiences, including substantial financial hardship, particularly in an era of rapidly rising costs for cancer care. However, the presence of health insurance does not completely shield enrollees from high levels of out-of-pocket spending on health care services.

In the Medicare population, access to supplemental insurance and Medicare Part D plans has helped shield patients from some of the out-of-pocket cost burden. In an analysis of data from MEPS 2002–2010, outpatient prescription costs for adults older than 65 years decreased by 43% after the introduction of Medicare Part D, while younger patients (not yet Medicare-eligible) did not experience a similar decline in out-of-pocket expenditures for prescription drugs over the same period.[39] Another study found that supplemental insurance decreased older Medicare beneficiaries' risk of high out-of-pocket expenditures on cancer care.[6] Whether these protections against high out-of-pocket spending may translate into other decreases in material financial hardship, financial distress, debt, and bankruptcy is not clearly known.

As the number of high-price orally administered anticancer drugs has increased, so has awareness of differences in coverage across infused and orally administered drugs for Medicare beneficiaries. Specifically, Medicare Part D, which covers orally administered or self-administered drugs, requires very high cost sharing for cancer drugs, with no out-of-pocket spending limit. One study showed that the price for a single fill of some of the most common cancer drugs under Medicare Part D (e.g., lenalidomide, ibrutinib, palbociclib, or enzalutamide) would cost a patient over $3,000 out-of-pocket. Cumulative spending over a year would exceed $10,000 for nearly all of these drugs.[40] In a study of fee-for-service Medicare beneficiaries treated at one of 11 geographically diverse academic medical centers, nearly one in three beneficiaries did not initiate the orally administered anticancer drugs prescribed by their doctors within 90 days of the prescription order date.[41] In that study, the initiation rate was 35% lower among individuals who did not have subsidies that lowered their out-of-pocket costs (adjusted RR, 0.65; 95% CI, 0.52–0.81), suggesting that costs influenced drug initiation.

The influence of type of insurance plan on the risk of financial hardship among patients younger than 65 years has not been thoroughly explored. One study found that patients with public insurance (Medicaid or Medicare) have an increased risk of financial hardship compared with patients who have private insurance (OR, 1.95; P < .0001).[8] However, having public health insurance may also be associated with lower savings and assets and, therefore, increased financial vulnerability, factors that were not controlled for in this analysis.

### References

Dowling EC, Chawla N, Forsythe LP, et al.: Lost productivity and burden of illness in cancer survivors with and without other chronic conditions. Cancer 119 (18): 3393-401, 2013.23794146
Allaire BT, Ekwueme DU, Guy GP, et al.: Medical Care Costs of Breast Cancer in Privately Insured Women Aged 18-44 Years. Am J Prev Med 50 (2): 270-7, 2016.26775906
Kent EE, Forsythe LP, Yabroff KR, et al.: Are survivors who report cancer-related financial problems more likely to forgo or delay medical care? Cancer 119 (20): 3710-7, 2013.23907958
Regenbogen SE, Veenstra CM, Hawley ST, et al.: The personal financial burden of complications after colorectal cancer surgery. Cancer 120 (19): 3074-81, 2014.24889014
Guy GP, Yabroff KR, Ekwueme DU, et al.: Economic Burden of Chronic Conditions Among Survivors of Cancer in the United States. J Clin Oncol 35 (18): 2053-2061, 2017.28471724
Davidoff AJ, Erten M, Shaffer T, et al.: Out-of-pocket health care expenditure burden for Medicare beneficiaries with cancer. Cancer 119 (6): 1257-65, 2013.23225522
Ramsey S, Blough D, Kirchhoff A, et al.: Washington State cancer patients found to be at greater risk for bankruptcy than people without a cancer diagnosis. Health Aff (Millwood) 32 (6): 1143-52, 2013.23676531
Banegas MP, Guy GP, de Moor JS, et al.: For Working-Age Cancer Survivors, Medical Debt And Bankruptcy Create Financial Hardships. Health Aff (Millwood) 35 (1): 54-61, 2016.26733701
Shankaran V, Jolly S, Blough D, et al.: Risk factors for financial hardship in patients receiving adjuvant chemotherapy for colon cancer: a population-based exploratory analysis. J Clin Oncol 30 (14): 1608-14, 2012.22412136
Yabroff KR, Dowling EC, Guy GP, et al.: Financial Hardship Associated With Cancer in the United States: Findings From a Population-Based Sample of Adult Cancer Survivors. J Clin Oncol 34 (3): 259-67, 2016.26644532
Nathan PC, Henderson TO, Kirchhoff AC, et al.: Financial Hardship and the Economic Effect of Childhood Cancer Survivorship. J Clin Oncol 36 (21): 2198-2205, 2018.29874136
Nipp RD, Kirchhoff AC, Fair D, et al.: Financial Burden in Survivors of Childhood Cancer: A Report From the Childhood Cancer Survivor Study. J Clin Oncol 35 (30): 3474-3481, 2017.28817372
Chino F, Peppercorn J, Taylor DH, et al.: Self-reported financial burden and satisfaction with care among patients with cancer. Oncologist 19 (4): 414-20, 2014.24668333
Sharrocks K, Spicer J, Camidge DR, et al.: The impact of socioeconomic status on access to cancer clinical trials. Br J Cancer 111 (9): 1684-7, 2014.25093493
DiMartino LD, Birken SA, Mayer DK: The Relationship Between Cancer Survivors' Socioeconomic Status and Reports of Follow-up Care Discussions with Providers. J Cancer Educ 32 (4): 749-755, 2017.27006193
Jagsi R, Pottow JA, Griffith KA, et al.: Long-term financial burden of breast cancer: experiences of a diverse cohort of survivors identified through population-based registries. J Clin Oncol 32 (12): 1269-76, 2014.24663041
Pisu M, Kenzik KM, Oster RA, et al.: Economic hardship of minority and non-minority cancer survivors 1 year after diagnosis: another long-term effect of cancer? Cancer 121 (8): 1257-64, 2015.25564986
Jagsi R, Ward KC, Abrahamse PH, et al.: Unmet need for clinician engagement regarding financial toxicity after diagnosis of breast cancer. Cancer 124 (18): 3668-3676, 2018.30033631
Whitney RL, Bell JF, Reed SC, et al.: Predictors of financial difficulties and work modifications among cancer survivors in the United States. J Cancer Surviv 10 (2): 241-50, 2016.26188363
Palmer JD, Patel TT, Eldredge-Hindy H, et al.: Patients Undergoing Radiation Therapy Are at Risk of Financial Toxicity: A Patient-based Prospective Survey Study. Int J Radiat Oncol Biol Phys 101 (2): 299-305, 2018.29726359
Yabroff KR, Lawrence WF, Clauser S, et al.: Burden of illness in cancer survivors: findings from a population-based national sample. J Natl Cancer Inst 96 (17): 1322-30, 2004.15339970
Ekenga CC, Pérez M, Margenthaler JA, et al.: Early-stage breast cancer and employment participation after 2 years of follow-up: A comparison with age-matched controls. Cancer 124 (9): 2026-2035, 2018.29437204
Blinder VS, Patil S, Thind A, et al.: Return to work in low-income Latina and non-Latina white breast cancer survivors: a 3-year longitudinal study. Cancer 118 (6): 1664-74, 2012.22009703
Jagsi R, Hawley ST, Abrahamse P, et al.: Impact of adjuvant chemotherapy on long-term employment of survivors of early-stage breast cancer. Cancer 120 (12): 1854-62, 2014.24777606
Earle CC, Chretien Y, Morris C, et al.: Employment among survivors of lung cancer and colorectal cancer. J Clin Oncol 28 (10): 1700-5, 2010.20194860
Veenstra CM, Regenbogen SE, Hawley ST, et al.: Association of Paid Sick Leave With Job Retention and Financial Burden Among Working Patients With Colorectal Cancer. JAMA 314 (24): 2688-90, 2015 Dec 22-29.26717032
McLennan V, Ludvik D, Chambers S, et al.: Work after prostate cancer: a systematic review. J Cancer Surviv 13 (2): 282-291, 2019.30900159
Mujahid MS, Janz NK, Hawley ST, et al.: Racial/ethnic differences in job loss for women with breast cancer. J Cancer Surviv 5 (1): 102-11, 2011.20936435
Tevaarwerk AJ, Lee JW, Terhaar A, et al.: Working after a metastatic cancer diagnosis: Factors affecting employment in the metastatic setting from ECOG-ACRIN's Symptom Outcomes and Practice Patterns study. Cancer 122 (3): 438-46, 2016.26687819
Alleaume C, Bendiane MK, Bouhnik AD, et al.: Chronic neuropathic pain negatively associated with employment retention of cancer survivors: evidence from a national French survey. J Cancer Surviv 12 (1): 115-126, 2018.28975504
Blinder V, Eberle C, Patil S, et al.: Women With Breast Cancer Who Work For Accommodating Employers More Likely To Retain Jobs After Treatment. Health Aff (Millwood) 36 (2): 274-281, 2017.28167716
Blinder V, Patil S, Eberle C, et al.: Early predictors of not returning to work in low-income breast cancer survivors: a 5-year longitudinal study. Breast Cancer Res Treat 140 (2): 407-16, 2013.23884596
Mujahid MS, Janz NK, Hawley ST, et al.: The impact of sociodemographic, treatment, and work support on missed work after breast cancer diagnosis. Breast Cancer Res Treat 119 (1): 213-20, 2010.19360466
Jagsi R, Abrahamse PH, Lee KL, et al.: Treatment decisions and employment of breast cancer patients: Results of a population-based survey. Cancer 123 (24): 4791-4799, 2017.28990155
Dahl S, Loge JH, Berge V, et al.: Influence of radical prostatectomy for prostate cancer on work status and working life 3 years after surgery. J Cancer Surviv 9 (2): 172-9, 2015.25216609
Dahl S, Steinsvik EA, Dahl AA, et al.: Return to work and sick leave after radical prostatectomy: a prospective clinical study. Acta Oncol 53 (6): 744-51, 2014.24195691
Blinder VS, Murphy MM, Vahdat LT, et al.: Employment after a breast cancer diagnosis: a qualitative study of ethnically diverse urban women. J Community Health 37 (4): 763-72, 2012.22109386
Glare PA, Nikolova T, Alickaj A, et al.: Work Experiences of Patients Receiving Palliative Care at a Comprehensive Cancer Center: Exploratory Analysis. J Palliat Med 20 (7): 770-773, 2017.28562160
Kircher SM, Johansen ME, Nimeiri HS, et al.: Impact of Medicare Part D on out-of-pocket drug costs and medical use for patients with cancer. Cancer 120 (21): 3378-84, 2014.24962682
Dusetzina SB: Your Money or Your Life - The High Cost of Cancer Drugs under Medicare Part D. N Engl J Med 386 (23): 2164-2167, 2022.35507526
Dusetzina SB, Huskamp HA, Rothman RL, et al.: Many Medicare Beneficiaries Do Not Fill High-Price Specialty Drug Prescriptions. Health Aff (Millwood) 41 (4): 487-496, 2022.35377748

## Consequences of Financial Toxicity Among Cancer Patients

Several retrospective cohort and cross-sectional studies have investigated the associations among financial burden from cancer care and treatment adherence, quality of life, satisfaction with care, incurring debt, filing for bankruptcy, and health outcomes. Cohort and cross-sectional studies are prone to study biases inherent to such study designs; therefore, caution must be taken when interpreting the reported findings. So far, no evidence from randomized controlled clinical trials is available to guide patients and physicians about outcomes related to financial toxicity among individuals diagnosed with cancer.

### Access and Adherence to Treatments

Several retrospective cohort studies have evaluated the effect of prescription copayment amounts for cancer drugs on patient compliance with therapy.[1,2]

A cross-sectional study using data from the 2011 to 2014 National Health Interview Survey (https://www.cdc.gov/nchs/nhis/index.htm) found that individuals aged 18 to 64 years with a recent or previous cancer diagnosis were more likely to report changing their prescription drug use (e.g., not filling prescriptions or skipping doses) for financial reasons than individuals without a history of cancer.[3] Another study examined the association between imatinib copayment and medication adherence among patients with chronic myeloid leukemia, from 2002 to 2011, using MarketScan health plan claims.[1] Over the study period, monthly copayments for imatinib ranged from $0 to $4,792, with a mean and median of $108 and $30, respectively. Patients in the highest quantile of monthly copayments for imatinib (mean, $53) compared with patients in the lowest quantile (mean, $17) had a statistically significant adjusted risk ratio (RR) of 1.70 (95% confidence interval [CI], 1.30–2.22) for discontinuing imatinib during the first 180 days of treatment.[1] Similarly, patients with higher copayments for imatinib (vs. the lower copayment group) had an adjusted RR of 1.42 (95% CI, 1.19–1.69) for nonadherence to their imatinib therapy.[1]

Other studies examined the association between copayment amounts for adjuvant endocrine therapy, aromatase inhibitors, and tamoxifen and noncompliance in women with breast cancer.[2,4,5] Studies have been relatively consistent in showing that at the highest levels of copayment, cancer patients become less likely to take cancer-related medications on a daily basis (nonadherence), or they discontinue their medications over the long term (nonpersistence of use). Reduced adherence to cancer medications may be worse when the total out-of-pocket cost of all prescription drugs taken by the patient is considered.[5]

A cross-sectional survey study of adult patients (N = 300) receiving cancer therapy at Duke Cancer Institute found that 16% of patients reported high or overwhelming financial distress, 27% reported medication nonadherence, and 4.67% reported chemotherapy nonadherence.[6] Among patients reporting medication nonadherence, 14% specified skipping medication doses to make the prescription last longer, 11% stated they took less medication than prescribed to make the prescription last longer, and 22% indicated that they did not fill a prescription because of cost.[6] Among the patients reporting chemotherapy nonadherence, 1% skipped chemotherapy doses to make the prescription last longer, 1.67% took less chemotherapy to make the prescription last longer, and 3.33% did not fill a chemotherapy prescription because of cost.

This study also found that an increased likelihood of nonadherence was associated with the following characteristics:

- Previous out-of-pocket cost discussion (adjusted odds ratio [OR], 2.58; 95% CI, 1.14–5.85).
- Higher financial burden than expected (adjusted OR, 2.90; 95% CI, 1.42–5.89).
- High financial distress (adjusted OR, 1.64; 95% CI, 1.38–1.96).

A statistically significant decreased risk of nonadherence was associated with having private insurance (adjusted OR, 0.31; 95% CI, 0.14–0.72).

A cross-sectional cohort study of 10,508 patients who started oral chemotherapy between 2007 and 2009 examined the association between prescription abandonment rates and cost sharing.[7] Abandonment was defined as a paid prescription claim gap of more than 90 days. An adjusted analysis found that claims with cost sharing of $251 to $350 had 2.3 times the likelihood of abandonment (95% CI, 1.59–3.36); $351 to $500 had 3.28 times the likelihood of abandonment (95% CI, 2.20–4.88); and more than $500 had 4.46 times the likelihood of abandonment (95% CI, 3.80–5.22) when compared with cost sharing of $100 or less.[7] Additionally, the study identified a substantially higher proportion of patients who paid more than $500 out of pocket for their first oral chemotherapy claim in the Medicare group compared with the commercially insured group (45.5% vs. 10.7%; P < .001).[7]

Anecdotal reports also suggest that terminally ill cancer patients are foregoing the opportunity to obtain lethal doses of barbiturates in states with death-with-dignity laws because the price of these generic medications has increased to approximately $3,000 for a typical prescription.[8]

### Quality of Life and Perceived Quality of Care

In a prospective, observational, population- and health care systems–based cohort study, the associations between financial burden, quality of life, and perceived quality of care were investigated using Cancer Care Outcomes Research and Surveillance Consortium (CanCORS) II data. Patient-reported health-related quality of life was measured using the EuroQol five-dimensions questionnaire (EQ-5D).

From 2003 to 2006, patients were enrolled in the U.S. CanCORS study within 3 months of receiving either a colorectal or lung cancer diagnosis. For the CanCORS II study, among the surviving CanCORS patients, one disease-free subcohort and one advanced-disease subcohort were selected and resurveyed about their quality of life. The median time from diagnosis was 7.3 years. An adjusted structural equation modeling analysis found that higher financial distress was negatively associated with health-related quality of life (adjusted beta, -0.06 per burden category; 95% CI, -0.08 to -0.05); however, financial distress was not associated with perceived quality of care (OR, 1.09; 95% CI, 0.93–1.29).[9] A lower perceived quality of care was associated with a poorer health-related quality of life (OR, 0.85; 95% CI, 0.79–0.92).[9] Moreover, having advanced disease was strongly associated with a poorer health-related quality of life (OR, -0.04; 95% CI, -0.08 to -0.01), but no association was observed with financial distress (OR, 1.25; 95% CI, 0.79–1.98).[9]

Another cohort study using CanCORS data [10] found that financial strain was negatively associated with health-related quality of life and positively associated with symptom burden among patients with a lung or colorectal cancer diagnosis. Among patients with lung cancer, those with fewer than 12 months of financial reserves to continue their current standard of living reported increased symptom burden (adjusted mean difference, 5.25; 95% CI, 3.29–0.22), increased pain (adjusted mean difference, 5.03; 95% CI, 3.29–7.22), and lower quality of life (adjusted mean difference, 4.70; 95% CI, 2.82–6.58) compared with patients with more than 12 months of financial reserves.[10] Similarly, colorectal cancer patients with fewer than 12 months of financial reserves to continue to live at their current standard of living reported increased symptom burden (adjusted mean difference, 5.31; 95% CI, 3.58–7.04), increased pain (adjusted mean difference, 3.45; 95% CI, 1.25–5.66), and lower quality of life (adjusted mean difference, 5.22; 95% CI, 3.61–6.82) compared with those who reported more than 12 months of financial reserves.[10]

Several cross-sectional studies evaluated the impact of the financial burden of cancer care on patient quality of life. A survey analysis involving 149 patients with advanced-stage cancer in Texas at a public hospital (n = 72) and a comprehensive cancer center (n = 77) found that the median intensity of financial distress was double among patients treated in a public hospital compared with those treated in a comprehensive cancer center (on a scale of 0 = best to 10 = worst; 8 vs. 4; P = .0003).[11] More than 30% of patients perceived financial distress as being more severe than physical, emotional, social, or family distress.[11] Additionally, advanced-stage cancer patients in the public hospital reported the impact of financial distress relative to the impact of social and family distress as "strongly agree", "agree", or "somewhat agree" more frequently compared with patients treated in the comprehensive cancer center (54% vs. 33%, P = .0085).[11] Financial distress was inversely correlated with quality of life (r = -0.23; P = .0057).

Another study analyzed answers to the question, "To what degree has cancer caused financial problems for you and your family?" Among 2,108 patients from the 2010 National Health Interview Survey (NHIS), those who responded "a lot" (8.6%) were more likely to report the following when compared with those who reported no financial burden:[12]

- Poor physical health (18.6% vs. 4.3%; P < .001).
- Poor mental health (8.3% vs. 1.8%; P < .001).
- Poor satisfaction with social activities and relationships (11.8% vs. 3.6%; P < .001).
- Less likely to report their quality of life as at least Good (adjusted OR, 9.24; 95% CI, 0.14–0.40).

Using the 2011 Medical Expenditure Panel Survey (MEPS) data, one study [13] found that among 1,380 identified cancer survivors, 28.7% reported cancer-related financial burden. Additionally, cancer survivors who reported financial burden when compared with those who reported no financial burden were found to have the following outcomes:[13]

- A lower Physical Component Score (beta, -2.45; 95% CI, -3.75 to -0.23).
- A lower Mental Component Score (beta, -3.05; 95% CI, -4.42 to -1.67).
- A greater likelihood of experiencing a depressed mood (adjusted OR, 1.95; 95% CI, 1.29–2.95).
- A greater likelihood of cancer recurrence–related worries (adjusted OR, 3.54; 95% CI, 2.65–4.72).

### Satisfaction With Care

A review study documented that approximately 60% of people across a wide range of studies reported positive attitudes about cost-related discussions with their health care providers. Despite this finding, less than one-third of patients have had these discussions.[14] One study among women with breast cancer documented unmet need for engagement. Specifically, 72.8% of the 945 women who expressed worrying about finances at least somewhat indicated that cancer physicians and their staff did not help "at least somewhat".[15] Additionally, 55.4% of the 523 women in the same study who expressed a desire to talk to health care providers about the impact of breast cancer on employment or finances reported that they had not had a relevant discussion with their cancer physicians, primary care providers, social workers, or other professionals.[15]

### Adverse Financial Events, Debt, and Bankruptcy

The impact of the financial burden of cancer care on adverse financial events, debt, and bankruptcy has been studied.[16-18]

One cross-sectional study, using the Livestrong 2012 survey data of 4,719 cancer survivors, reported that 63.8% of the survivors had worried about paying large bills related to cancer, 33.6% had gone into debt, 3.1% had filed for bankruptcy, and 39.7% had to make other kinds of financial sacrifices because of their cancer, its treatment, or the lasting effects of treatment.[16] Of those who reported going into debt, 9.1% had filed for bankruptcy, 55% incurred debt that totaled $10,000 or more, and 68% had to make other kinds of financial sacrifices.[16]

Furthermore, this study found that an increased likelihood of filing for bankruptcy was associated with the following characteristics of cancer patients:[16]

- Younger age (adjusted OR, 18–44 years, 1.81; 95% CI, 1.10–2.98; adjusted OR, 45–54 years, 1.86; 95% CI, 1.15–3.01; vs. 55–64 years).
- Lower household income (adjusted OR, ≤$40,000, 4.50; 95% CI, 2.56–7.93; adjusted OR, $41,000–$80,000, 2.80; 95% CI, 1.71–4.60; vs. ≥$80,000).
- Public health insurance (adjusted OR, 1.82; 95% CI, 1.08–3.06; vs. private health insurance).

Similar patient characteristics were reported for those going into medical debt.[16]

A retrospective cohort study, using data from the 1995–2009 western Washington Surveillance, Epidemiology, and End Results (SEER) Cancer Registry–linked U.S. Bankruptcy Court for the Western District of Washington, found that patients with cancer diagnoses were more likely (hazard ratio [HR], 2.65; P < .05) to file for bankruptcy compared with patients without cancer.[17] Patients with thyroid cancer had the highest HR (HR, 3.46; P < .05).[17]

Another retrospective cohort study evaluated the risk of adverse financial events among patients with cancer. Investigators used data from the western Washington SEER Cancer Registry linked with TransUnion quarterly credit records, along with data from a control group selected from state voter registration records.[18] Adverse financial events reported on credit records included an inability to pay bills (collections or charge-offs), tax liens and delinquent mortgage payments, and foreclosures or repossessions of personal property. Also evaluated were past-due credit card payments as a secondary outcome. The rate of adverse financial events was nearly twice as high for people with cancer than for the control group (4.3% vs. 2.4%; P < .001). The severity of adverse financial events was greater for those with cancer than for the control group (3.8% vs. 1.9%). In addition, Black patients were more likely than White patients to experience adverse financial events (15.2% vs. 4.2%; P < .001).

A clearly worded grading system has been developed to identify different levels of financial toxicity.[19] The usefulness of this system for categorizing and monitoring financial outcomes after cancer treatment has not been evaluated.

### Impact on Caregivers

Informal cancer caregivers often share in the experience of financial toxicity by spending money on food, medications, and other patient needs in addition to taking time off from work to provide logistical, emotional, and medical support. In a recent survey of over 5,000 cancer patients whose caregivers were friends or family members, approximately 25% reported that their caregivers made significant employment changes after the cancer diagnosis, and 8% of survivors had caregivers who took at least 2 months of leave from work.[20] Evidence suggests that the cumulative financial and employment impacts of cancer caregiving can lead to higher caregiver burden, poorer quality of life, and poorer mental health among cancer caregivers.[21-27]

Terminally ill cancer patients from households reporting financial hardship had a higher likelihood of receiving intensive life-prolonging care (defined as receiving ventilation or resuscitation to prolong life) than did those who did not report financial hardship (OR, 3.22; 95% CI, 1.38−7.53). In a longitudinal survey of 281 terminally ill cancer patients, 29% reported using most or all of their household’s financial savings because of illness.[28]

### Survival

In one retrospective cohort study, using data in the western Washington SEER Cancer Registry, cancer patients who filed for bankruptcy had an increased risk of mortality compared with those who did not file for bankruptcy (adjusted HR, 1.79; 95% CI, 1.64–1.96).[29] Hazard ratios were highest for patients with prostate cancer (adjusted HR, 2.07; 95% CI, 1.56–2.74) and colorectal cancer (adjusted HR, 2.47; 95% CI, 1.85–3.31).[29]

### Internal and External Validity Concerns With Observational Studies

Data from randomized controlled trials offer the strongest evidence for establishing the efficacy of treatment on cancer outcomes. However, because cancer patients cannot ethically be subjected to financial toxicity through randomization, the current body of evidence is primarily from observational data, particularly from cross-sectional and cohort studies. Large nationally representative surveys provide the best estimates of the prevalence of certain conditions.

However, observational studies are prone to biases that may limit the validity of their findings. Several sources of bias are likely to be particularly important in observational studies assessing the association of financial toxicity with future outcomes, creating a challenge in interpreting the results of such studies.

In cross-sectional survey studies, high nonresponse rates may lead to possible nonresponse bias in reported estimates if the potential answers of nonrespondents vary from those who did respond. Another source of bias in survey research is reporting bias, which occurs when respondents reveal selective information that they believe is more socially desirable.

Another source of bias in observational studies is reverse causality, which may weaken any true association between financial toxicity and its potentially related outcomes. In one study,[29] investigators provided an example of how reverse causality should be addressed in this type of work. In this instance, the authors performed a sensitivity analysis limiting their sample to early-stage cancer patients who declared bankruptcy within 1 year of diagnosis. They fit their previously developed Cox models, regressing survival on bankruptcy filing status, using this new population sample.

### References

Dusetzina SB, Winn AN, Abel GA, et al.: Cost sharing and adherence to tyrosine kinase inhibitors for patients with chronic myeloid leukemia. J Clin Oncol 32 (4): 306-11, 2014.24366936
Neugut AI, Subar M, Wilde ET, et al.: Association between prescription co-payment amount and compliance with adjuvant hormonal therapy in women with early-stage breast cancer. J Clin Oncol 29 (18): 2534-42, 2011.21606426
Zheng Z, Han X, Guy GP, et al.: Do cancer survivors change their prescription drug use for financial reasons? Findings from a nationally representative sample in the United States. Cancer 123 (8): 1453-1463, 2017.28218801
Farias AJ, Du XL: Association Between Out-Of-Pocket Costs, Race/Ethnicity, and Adjuvant Endocrine Therapy Adherence Among Medicare Patients With Breast Cancer. J Clin Oncol 35 (1): 86-95, 2017.28034069
Kim J, Rajan SS, Du XL, et al.: Association between financial burden and adjuvant hormonal therapy adherence and persistent use for privately insured women aged 18-64 years in BCBS of Texas. Breast Cancer Res Treat 169 (3): 573-586, 2018.29423900
Bestvina CM, Zullig LL, Rushing C, et al.: Patient-oncologist cost communication, financial distress, and medication adherence. J Oncol Pract 10 (3): 162-7, 2014.24839274
Streeter SB, Schwartzberg L, Husain N, et al.: Patient and plan characteristics affecting abandonment of oral oncolytic prescriptions. J Oncol Pract 7 (3 Suppl): 46s-51s, 2011.21886519
Shankaran V, LaFrance RJ, Ramsey SD: Drug Price Inflation and the Cost of Assisted Death for Terminally Ill Patients-Death With Indignity. JAMA Oncol 3 (1): 15-16, 2017.27711921
Zafar SY, McNeil RB, Thomas CM, et al.: Population-based assessment of cancer survivors' financial burden and quality of life: a prospective cohort study. J Oncol Pract 11 (2): 145-50, 2015.25515717
Lathan CS, Cronin A, Tucker-Seeley R, et al.: Association of Financial Strain With Symptom Burden and Quality of Life for Patients With Lung or Colorectal Cancer. J Clin Oncol 34 (15): 1732-40, 2016.26926678
Delgado-Guay M, Ferrer J, Rieber AG, et al.: Financial Distress and Its Associations With Physical and Emotional Symptoms and Quality of Life Among Advanced Cancer Patients. Oncologist 20 (9): 1092-8, 2015.26205738
Fenn KM, Evans SB, McCorkle R, et al.: Impact of financial burden of cancer on survivors' quality of life. J Oncol Pract 10 (5): 332-8, 2014.24865220
Kale HP, Carroll NV: Self-reported financial burden of cancer care and its effect on physical and mental health-related quality of life among US cancer survivors. Cancer 122 (8): 283-9, 2016.26991528
Shih YT, Chien CR: A review of cost communication in oncology: Patient attitude, provider acceptance, and outcome assessment. Cancer 123 (6): 928-939, 2017.27893929
Jagsi R, Ward KC, Abrahamse PH, et al.: Unmet need for clinician engagement regarding financial toxicity after diagnosis of breast cancer. Cancer 124 (18): 3668-3676, 2018.30033631
Banegas MP, Guy GP, de Moor JS, et al.: For Working-Age Cancer Survivors, Medical Debt And Bankruptcy Create Financial Hardships. Health Aff (Millwood) 35 (1): 54-61, 2016.26733701
Ramsey S, Blough D, Kirchhoff A, et al.: Washington State cancer patients found to be at greater risk for bankruptcy than people without a cancer diagnosis. Health Aff (Millwood) 32 (6): 1143-52, 2013.23676531
Shankaran V, Li L, Fedorenko C, et al.: Risk of Adverse Financial Events in Patients With Cancer: Evidence From a Novel Linkage Between Cancer Registry and Credit Records. J Clin Oncol 40 (8): 884-891, 2022.34995125
Khera N: Reporting and grading financial toxicity. J Clin Oncol 32 (29): 3337-8, 2014.25199760
de Moor JS, Dowling EC, Ekwueme DU, et al.: Employment implications of informal cancer caregiving. J Cancer Surviv 11 (1): 48-57, 2017.27423439
Kent EE, Dionne-Odom JN: Population-Based Profile of Mental Health and Support Service Need Among Family Caregivers of Adults With Cancer. J Oncol Pract 15 (2): e122-e131, 2019.30496020
Shin JY, Lim JW, Shin DW, et al.: Underestimated caregiver burden by cancer patients and its association with quality of life, depression and anxiety among caregivers. Eur J Cancer Care (Engl) 27 (2): e12814, 2018.29333736
Ullrich A, Ascherfeld L, Marx G, et al.: Quality of life, psychological burden, needs, and satisfaction during specialized inpatient palliative care in family caregivers of advanced cancer patients. BMC Palliat Care 16 (1): 31, 2017.28486962
Shaffer KM, Kim Y, Carver CS, et al.: Effects of caregiving status and changes in depressive symptoms on development of physical morbidity among long-term cancer caregivers. Health Psychol 36 (8): 770-778, 2017.28639819
Rumpold T, Schur S, Amering M, et al.: Informal caregivers of advanced-stage cancer patients: Every second is at risk for psychiatric morbidity. Support Care Cancer 24 (5): 1975-1982, 2016.26476628
Litzelman K, Kent EE, Rowland JH: Social factors in informal cancer caregivers: The interrelationships among social stressors, relationship quality, and family functioning in the CanCORS data set. Cancer 122 (2): 278-86, 2016.26479767
Kent EE, Rowland JH, Northouse L, et al.: Caring for caregivers and patients: Research and clinical priorities for informal cancer caregiving. Cancer 122 (13): 1987-95, 2016.26991807
Tucker-Seeley RD, Abel GA, Uno H, et al.: Financial hardship and the intensity of medical care received near death. Psychooncology 24 (5): 572-8, 2015.25052138
Ramsey SD, Bansal A, Fedorenko CR, et al.: Financial Insolvency as a Risk Factor for Early Mortality Among Patients With Cancer. J Clin Oncol 34 (9): 980-6, 2016.26811521

## Evidence Gaps and Areas for Future Research

Considering the conceptual framework for cancer and its impact on health care use, health outcomes, and financial effects, based on extant models, allows exploration of current evidence, gaps in evidence, and areas for future research.[1,2]

### Risk Factors

Although many individual risk factors for financial hardship have been identified, the evidence that demonstrates the degree to which these factors contribute to the risk of later financial hardship is insufficient, as is information about the interplay between these factors and clinical factors at the time of diagnosis.

Specific areas in need of further study to address their influence on the risk of financial distress after a cancer diagnosis include the following:

- Preexisting debt.
- Prediagnosis conditions (i.e., overall comorbidity burden and the presence of specific illnesses).
- Types of employment (e.g., hourly vs. salaried).
- Asset levels.

Because ample evidence shows that financial distress occurs even among patients with health insurance, the role of different forms of insurance in protecting individuals from financial distress requires further study. Medicare may at least partially protect older people from financial harm. However, other factors associated with older age might also reduce the risk of financial distress, namely, retired adults typically have higher levels of assets (e.g., owning a home outright), pensions or retirement accounts, and Social Security. Another factor is that physicians may treat older patients less intensively and thus less expensively.

For adults of working age, characteristics of work-sponsored or individually purchased commercial insurance that vary from plan to plan—specifically, deductibles, copay levels, and coverage exclusions—may influence the risk of financial distress. These factors also warrant further study.

After patients are diagnosed with cancer and miss work during treatment, their ability to continue to work or return to work greatly influences their risk of financial hardship. Studies are needed that relate particular treatments, modalities of treatment (e.g., infusional therapy vs. oral therapy), and toxicities of treatments with work absenteeism, loss of productivity, and likelihood of returning to the workforce.

Implementation of the U.S. Affordable Care Act in 2008 provided a natural experiment to determine whether expanding access to health insurance for millions of Americans had an impact on rates of financial distress or insolvency for people with cancer. Proposed pilots for different Medicare payment systems may also offer opportunities for quasi-experimental approaches that compare implementation with nonimplementation.[3]

After diagnosis, treatment choice could, in theory, influence the likelihood of financial difficulties. For many cancers, guidelines include options that are considered equivalent therapeutically, yet the costs of the treatments might vary by 50-fold or more.[4] For example, oral medications may come under a different copay structure than office-administered medicines. No retrospective or prospective evidence exists to show that, within an indication such as tumor type and stage, choice of treatment has a differential impact on out-of-pocket expenditure or level of financial distress. Because treatment choice is influenced by many factors, possibly including a patient's financial situation, prospective studies with detailed clinical and financial information are needed to investigate this issue.

Cancer management is unusual among medical interventions because it often involves intensive treatment at specialized facilities for weeks or months. For many patients, nonmedical costs associated with seeking treatment, such as the cost of transportation and lodging during treatment, can take a financial toll on families. The role that nonmedical costs play in financial hardship is an area in need of further study.

### Financial Distress and Outcomes

Evidence from multiple retrospective studies shows that patients experiencing financial distress have reduced adherence to planned therapies, lower quality of life, and diminished survival. These studies have limitations because certain unmeasured clinical and financial factors that may influence treatment choice might also influence outcomes. Prospective or retrospective studies that include a more-comprehensive picture of financial status at diagnosis and clinical and patient factors that might influence treatment choice would provide a more accurate picture of the causal pathway between financial distress and outcomes.

### Interventions Aimed at Reducing Financial Distress Among Cancer Patients

Several interventions specifically designed to reduce rates of financial distress among cancer patients have been proposed. Some are being implemented, but, to date, there have been no prospective studies evaluating the impact of these interventions on the rates and severity of financial distress, care choices, quality of life, or survival. Several of the most commonly discussed interventions are reviewed below.

#### Financial navigators

Financial navigators are being used in community and academic settings to help cancer patients avoid adverse financial consequences after a cancer diagnosis.[5] The impact of these programs on patients’ financial and health outcomes is an area for future study. Specific issues of interest include the following:

- The impact of assessing risk factors for financial distress at diagnosis.
- Socioeconomic correlates of patients seeking and receiving financial counseling and assistance for their cancer care. Patient and family responsibility in relation to the offer of financial assistance for cancer care across different types of interventions and by different provider organizations needs to be better quantified.
- The impact of various types of financial information and assistance that are offered by care providers.
- The impact of counseling techniques to manage finances.

One prospective study (S1417CD (https://www.cancer.gov/clinicaltrials/NCT02728804) [NCT02728804]), conducted in the National Cancer Institute Cooperative Cancer Clinical Trials Network, Implementation of a Prospective Financial Impact Assessment Tool in Patients with Metastatic Colorectal Cancer, evaluated the incidence of treatment-related financial hardship among patients with newly diagnosed metastatic colorectal cancer.[6] In addition to detailed clinical information, patient credit history at baseline and throughout treatment, health-related quality of life, out-of-pocket costs, treatment nonadherence, and caregiver burden was measured over 12 months.

#### Price transparency to facilitate treatment choice

Studies of price transparency initiatives, such as one that required California hospitals to publish their charges, have not found that they significantly influence patient treatment choice or pricing of goods and services by health care providers.[7] Looking at price transparency and provider behavior, one controlled study found that providing clinicians with information about test costs in electronic medical record order-entry forms reduced the number of tests ordered compared with not providing this information.[8] It is not known whether providing price transparency would alter cancer patient or clinician choices for care.

More information is needed regarding how responsive cancer patients, their families, and/or their providers might be to offers of pricing transparency, direct or indirect financial assistance, or further reductions in out-of-pocket payment requirements.

#### Value-based pricing

Closely related to price transparency is the concept of value-based pricing, the idea that patients’ out-of-pocket expenditures are tied to external assessment of value for competing therapies for particular conditions. The objective of value-based pricing is to steer patients to higher-value therapies through financial incentives (higher value = lower out-of-pocket responsibility). Although value-based pricing has been implemented for several clinical conditions (e.g., hypertension, diabetes), and evidence exists that this type of pricing increases the use of higher-value services, it has not been applied in oncology. Because of the ongoing transformation in how medical providers are paid for the care of cancer patients, there is a need study patient financial toxicity in the context of alternative payment models and quality measure reforms.

It is also unclear when in the care trajectory more information and financial assistance are needed and will be most effective in encouraging treatment initiation and continuance. For example, most employer-based insurance policies have an annual out-of-pocket maximum, beyond which the insurer assumes 100% of the cost of care. Many patients with late-stage cancer reach the maximum quickly, in which case the insurer bears the full cost of anticancer treatments for the remainder of the benefit year.

#### Health insurance reform

By providing millions of previously uninsured Americans with health insurance, the Massachusetts health insurance plan and the U.S. Affordable Care Act have presented an opportunity for natural pre-post experiments for health care policies that are aimed at reducing the financial exposure of an individual during severe illness. Because insurance appears to mitigate rather than eliminate the risk of financial distress from a cancer diagnosis and treatment, other interventions aimed at improving financial outcomes for insured people are likely needed.

Another policy targeting providers and patients would be to require the use of patient decision aids that include benefits-cost and financial-toxicity assessments and assistance through measures-of-quality for fee-for-service Medicare payments under Medicare Access and CHIP (Children’s Health Insurance Program) Reauthorization Act (MACRA) legislation.[9,10] Pursuit of this policy would require endorsement by the Centers for Medicare and Medicaid Services and possibly legislation enacted by the U.S. Congress.

Reducing and/or eliminating patient copayment/coinsurance for pathway-adherent cancer care in the fee-for-service Medicare program and/or commercial plans would also likely reduce patient and family financial burden across multiple treatment modalities—radiation, drugs, inpatient and outpatient coinsurance, and copayments.[7,8] Another set of policies would eliminate the ban on pharmaceutical manufacturer-provided couponing and other patient-assistance programs to Medicare beneficiaries.[11]

### Cancer Treatment Costs References

Cancer treatment cost information can be difficult to access. Listed below are links to publicly available websites that contain updated information on costs related to cancer care:

- Medicare Part B (office-administered) drug costs (https://www.cms.gov/Medicare/Medicare-Fee-for-Service-Part-B-Drugs/McrPartBDrugAvgSalesPrice).
- Medicare benefits (https://www.medicare.gov/basics/costs/medicare-costs) (includes information on deductibles and copayments).

### References

Smith R, Clarke L, Berry K, et al.: A comparison of methods for linking health insurance claims with clinical records from a large cancer registry. [Abstract] Med Decis Making 21 (6): 530, 2001.
Fay S, Hurst E, White MJ: The household bankruptcy decision. Am Econ Rev 92 (3): 706-18, 2002.
Centers for Medicare & Medicaid Services: Oncology Care Model. Baltimore, Md: Centers for Medicare & Medicaid Services, 2016. Available online (https://innovation.cms.gov/initiatives/oncology-care/). Accessed December 8, 2016.
Ramsey S, Shankaran V: Managing the financial impact of cancer treatment: the role of clinical practice guidelines. J Natl Compr Canc Netw 10 (8): 1037-42, 2012.22878827
Conti RM, Bach PB: The 340B drug discount program: hospitals generate profits by expanding to reach more affluent communities. Health Aff (Millwood) 33 (10): 1786-92, 2014.25288423
Shankaran V; Southwest Oncology Group Cancer Care Delivery, Gastrointestinal Cancer: Implementation of a Prospective Financial Impact Assessment Tool in Patients with Metastatic Colorectal Cancer. April 15, 2016.
Kline RM, Bazell C, Smith E, et al.: Centers for medicare and medicaid services: using an episode-based payment model to improve oncology care. J Oncol Pract 11 (2): 114-6, 2015.25690596
Newcomer LN, Gould B, Page RD, et al.: Changing physician incentives for affordable, quality cancer care: results of an episode payment model. J Oncol Pract 10 (5): 322-6, 2014.25006221
Cutler DM: Payment reform is about to become a reality. JAMA 313 (16): 1606-7, 2015.25919512
Press MJ, Rajkumar R, Conway PH: Medicare's New Bundled Payments: Design, Strategy, and Evolution. JAMA 315 (2): 131-2, 2016.26720889
Howard DH: Drug companies' patient-assistance programs--helping patients or profits? N Engl J Med 371 (2): 97-9, 2014.25006717

## Latest Updates to This Summary (05/29/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Risk Factors Associated With Financial Toxicity

Added text to state that, compared with those without cancer, cancer survivors are more likely to report being unable to work, or being limited in the amount or type of work they can do, in both the short-term and long-term post-diagnosis periods (cited Yabroff et al., Ekenga et al., 2012 Blinder and Patil et al., 2014 Jagsi et al., Earle et al., Veenstra et al., and McLennan et al. as references 21–27, respectively). Also added text about the demographic and treatment factors that affect a survivor's ability to work (cited 2011 Mujahid et al., Tevaarwerk et al., Alleaume et al., 2017 Blinder et al., 2013 Blinder et al., 2010 Mujahid et al., 2017 Jagsi et al., 2015 Dahl, et al., and 2014 Dahl et al. as references 28–36, respectively). For patients with cancer, including those treated in the palliative setting, work promotes a sense of normalcy and control during and after treatment and provides income and insurance benefits (cited 2012 Blinder and Murphy et al. and Glare et al. as references 37 and 38, respectively).

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of cancer and financial toxicity. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Financial Toxicity and Cancer Treatment are:

- Stacie B. Dusetzina, PhD (Vanderbilt University School of Medicine)
- Scott D. Ramsey, MD, PhD (Fred Hutchinson Cancer Research Center)
- Veena Shankaran, MD, MS (Fred Hutchinson Cancer Research Center & University of Washington)
- K. Robin Yabroff, PhD (American Cancer Society)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Financial Toxicity and Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/managing-care/track-care-costs/financial-toxicity-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 27583328 ]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).